# Cancer of Unknown Primary (CUP) Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of cancer of unknown primary. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Cancer of Unknown Primary

A cancer of unknown primary (CUP) is defined as a biopsy-confirmed malignancy with no established primary site after pathological evaluation and radiographic studies. With the advent of comprehensive genomic profiling and positron emission tomography–computed tomography scanning, less than 1% of new cancer diagnoses are designated as CUP.[1-5]

Most CUPs are adenocarcinomas or undifferentiated tumors. Less commonly, squamous cell carcinomas, melanomas, sarcomas, germ cell tumors, and neuroendocrine tumors present with an undetermined primary site of origin.[6] In some patients, the primary site cannot be identified even at postmortem examination.

### Prognosis and Survival

The prognosis for patients with CUP is poor. Approximately 30% of patients are alive at 1 year.[1,7] CUP is represented by a heterogeneous group of diseases, all of which have presented with metastasis as the primary manifestation. Although most diseases are relatively refractory to cytotoxic treatments, molecular and genetic diagnostics can identify targeted therapies that may result in a much better prognosis.[1] In each instance, the clinician must consider distinct clinical and pathological details when selecting appropriate, and potentially curative, management.

Survival is worse for patients with any of the following characteristics: [8-10]

- Adenocarcinoma or undifferentiated carcinoma histology.
- Extranodal presentation.
- Older age.
- Hepatic or adrenal involvement.
- Poor performance status.
- Elevated serum lactate dehydrogenase (LDH).

Lymph node involvement or neuroendocrine histology were associated with longer survival in retrospective reviews.[8-10]

Patients who present with LDH levels within the reference range and an Eastern Cooperative Oncology Group performance status of 0 or 1 have better prognoses than those with high LDH levels or worse performance statuses.[10]

A review of five case control studies and 14 cohort studies found a clear increased risk of CUP with smoking.[11]

### Patterns of Metastases

Conceptually, CUP is a type of tumor that tends to metastasize early, unlike more common cases, in which the primary tumor is apparent, with or without metastasis. The pattern of spread of CUP at diagnosis can provide clues to the likelihood of the primary site being above or below the diaphragm. Lung metastases are twice as common in primary sites ultimately found to be above the diaphragm. Liver metastases are more common from primary disease sites below the diaphragm. A cancer presenting as CUP may have a significantly different pattern of metastasis than what is typically expected. For instance, when presenting as CUP, bone metastases are more common from pancreatic cancer and less common from lung cancer, unlike their typical presentation.

### Diagnostic Evaluation

The pathologist has a central role in the evaluation of CUP. A thorough evaluation of an adequate specimen using histology, immunohistochemistry, molecular diagnostics, next-generation sequencing (NGS), and, when appropriate, electron microscopy provides the most important clues in the diagnosis of CUP.[12- 16] Pathological evaluations provide guidance for an appropriate clinical evaluation.

The following tests may be used to diagnose CUP:

- Gene expression profiling: Gene expression profiling and NGS may identify a potential site of origin in patients with CUP.[5,12-14,17]
- Beta-human chorionic gonadotropin (beta-hCG) and alpha-fetoprotein (AFP) analysis: Beta-hCG and AFP are not absolutely specific for germ cell tumors, and AFP is not specific for hepatoma. However, abnormal levels of these proteins are an important finding in young men with a mediastinal or retroperitoneal mass. Prognosis is improved for patients with germ cell tumors treated with site-specific therapy.[18]
- Other tumor marker tests include prostate-specific antigen (prostate cancer) in men; CA-125 (ovarian or gynecologic cancers), CA 15-3 (breast cancer), and CA 27.29 (breast cancer) in women; and carcinoembryonic antigen (CEA), CA 19-9, CA 72-4 (adenocarcinoma), and chromogranin A (neuroendocrine cancer). Elevation of less specific tumor-specific markers such as CEA, CA 19-9, and CA 72-4 can be used to monitor progression or tumor response.
- Magnetic resonance imaging is used for head and neck presentations, brain metastases, suspected pelvic neoplasms, suspected breast cancer (with isolated axillary lymph nodes or isolated bone metastases), prostate lesions, and adrenal lesions.
- For patients with presumed CUP, a prior diagnosis of malignancy should be evaluated by pathological comparison, using genomic sequencing in both tissue and circulating tumor DNA, when available.[19]

Clinical, pathological, and molecular genetic tests have two goals. The first is to identify tumors that are responsive to available therapies. The second is to identify novel targeted therapies that might be applicable to the particular genetic profile.[5] The U.S. Food and Drug Administration (FDA) has approved some novel targeted therapies when a molecular target is identified in a cancer, regardless of primary site (including when no primary site is evident with metastases). Examples include tumors with the following actionable targets:.[20-27]

- High tumor mutational burden.
- Elevated PD-1 or PD-L1 expression.
- HER2 expression.
- Pathogenic variants in NTRK, RET, or EGFR.
- BRAF V600E pathogenic variant.
- ROS1 gene fusion.
- MET amplification.
- Homologous recombination repair deficiency/microsatellite instability.

Two randomized prospective trials published in 2019 compared standard chemotherapy (carboplatin and paclitaxel or cisplatin and gemcitabine) versus site-specific therapy using gene expression profiling.[28,29] There was no advantage to site-specific therapy in median progression-free survival (PFS) (5 months) or median overall survival (OS) (10–12 months) in either trial. However, most novel targeted therapies, including checkpoint inhibitors, were not available at that time.[28,29][Level of evidence B1]

A meta-analysis of five studies including 1,114 patients compared site-specific therapy from genomic profiling versus empiric therapy. There was no improvement in PFS (hazard ratio [HR], 0.93; 95% confidence interval [CI], 0.74–1.17; P = .534) or OS (HR, 0.75; 95% CI, 0.55–1.03; P = .069).[30][Level of evidence B1] Isolated benefit was seen in patients with more responsive tumors with an identified specifically targeted therapy.

In a retrospective analysis, a cohort of 97 patients with CUP underwent NGS of tissue- or blood-derived cell-free DNA (cfDNA). The median number of pathogenic genomic alterations found in tissue was four (range, 0–25), and the median number of genomic alterations found in cfDNA was two (range, 0–9).[31] Combination matched therapies based on these alterations might improve patient outcomes.[31] A matching score (MS) (roughly equivalent to the number of alterations targeted/total number of deleterious alterations) was calculated post hoc to quantify the degree of the tumor-to-drug match. Outcomes were compared for evaluable patients determined to be MS high (>50%; n = 15) or MS low (≤50%; n = 47). The median PFS was 10.4 months for MS-high patients and 2.8 months for MS-low patients (HR, 0.27; 95% CI, 0.11–0.64; P = .002). The OS was 15.8 months for MS-high patients and 6.9 months for MS-low patients (HR, 0.45; 95% CI, 0.17–1.16; P = .09).[31][Level of evidence C2]

### References

Binder C, Matthes KL, Korol D, et al.: Cancer of unknown primary-Epidemiological trends and relevance of comprehensive genomic profiling. Cancer Med 7 (9): 4814-4824, 2018.30019510
Kwee TC, Kwee RM: Combined FDG-PET/CT for the detection of unknown primary tumors: systematic review and meta-analysis. Eur Radiol 19 (3): 731-44, 2009.18925401
Burglin SA, Hess S, Høilund-Carlsen PF, et al.: 18F-FDG PET/CT for detection of the primary tumor in adults with extracervical metastases from cancer of unknown primary: A systematic review and meta-analysis. Medicine (Baltimore) 96 (16): e6713, 2017.28422888
Woo S, Becker AS, Do RKG, et al.: Impact of 18F-Fluorodeoxyglucose positron emission tomography on management of cancer of unknown primary: systematic review and meta-analysis. Eur J Cancer 159: 60-77, 2021.34742159
Conway AM, Mitchell C, Kilgour E, et al.: Molecular characterisation and liquid biomarkers in Carcinoma of Unknown Primary (CUP): taking the 'U' out of 'CUP'. Br J Cancer 120 (2): 141-153, 2019.30580378
Krämer A, Bochtler T, Pauli C, et al.: Cancer of unknown primary: ESMO Clinical Practice Guideline for diagnosis, treatment and follow-up. Ann Oncol 34 (3): 228-246, 2023.36563965
Varadhachary GR, Raber MN: Cancer of unknown primary site. N Engl J Med 371 (8): 757-65, 2014.25140961
Hess KR, Abbruzzese MC, Lenzi R, et al.: Classification and regression tree analysis of 1000 consecutive patients with unknown primary carcinoma. Clin Cancer Res 5 (11): 3403-10, 1999.10589751 20055668
Hemminki K, Bevier M, Hemminki A, et al.: Survival in cancer of unknown primary site: population-based analysis by site and histology. Ann Oncol 23 (7): 1854-63, 2012.22115926
Culine S, Kramar A, Saghatchian M, et al.: Development and validation of a prognostic model to predict the length of survival in patients with carcinomas of an unknown primary site. J Clin Oncol 20 (24): 4679-83, 2002.12488413
Hermans KEPE, Kazemzadeh F, Loef C, et al.: Risk factors for cancer of unknown primary: a literature review. BMC Cancer 23 (1): 314, 2023.37020279
Horlings HM, van Laar RK, Kerst JM, et al.: Gene expression profiling to identify the histogenetic origin of metastatic adenocarcinomas of unknown primary. J Clin Oncol 26 (27): 4435-41, 2008.18802156
Handorf CR, Kulkarni A, Grenert JP, et al.: A multicenter study directly comparing the diagnostic accuracy of gene expression profiling and immunohistochemistry for primary site identification in metastatic tumors. Am J Surg Pathol 37 (7): 1067-75, 2013.23648464
Ross JS, Wang K, Gay L, et al.: Comprehensive Genomic Profiling of Carcinoma of Unknown Primary Site: New Routes to Targeted Therapies. JAMA Oncol 1 (1): 40-9, 2015.26182302
Selves J, Long-Mira E, Mathieu MC, et al.: Immunohistochemistry for Diagnosis of Metastatic Carcinomas of Unknown Primary Site. Cancers (Basel) 10 (4): , 2018.29621151
Pauli C, Bochtler T, Mileshkin L, et al.: A Challenging Task: Identifying Patients with Cancer of Unknown Primary (CUP) According to ESMO Guidelines: The CUPISCO Trial Experience. Oncologist 26 (5): e769-e779, 2021.33687747
Ross JS, Sokol ES, Moch H, et al.: Comprehensive Genomic Profiling of Carcinoma of Unknown Primary Origin: Retrospective Molecular Classification Considering the CUPISCO Study Design. Oncologist 26 (3): e394-e402, 2021.33219618
Motzer RJ, Rodriguez E, Reuter VE, et al.: Molecular and cytogenetic studies in the diagnosis of patients with poorly differentiated carcinomas of unknown primary site. J Clin Oncol 13 (1): 274-82, 1995.7799031 95096957
Bochtler T, Endris V, Leichsenring J, et al.: Comparative genetic profiling aids diagnosis and clinical decision making in challenging cases of CUP syndrome. Int J Cancer 145 (11): 2963-2973, 2019.30963573
Adashek JJ, Menta AK, Reddy NK, et al.: Tissue-Agnostic Activity of BRAF plus MEK Inhibitor in BRAF V600-Mutant Tumors. Mol Cancer Ther 21 (6): 871-878, 2022.35413124
Subbiah V, Wolf J, Konda B, et al.: Tumour-agnostic efficacy and safety of selpercatinib in patients with RET fusion-positive solid tumours other than lung or thyroid tumours (LIBRETTO-001): a phase 1/2, open-label, basket trial. Lancet Oncol 23 (10): 1261-1273, 2022.36108661
Subbiah V, Cassier PA, Siena S, et al.: Pan-cancer efficacy of pralsetinib in patients with RET fusion-positive solid tumors from the phase 1/2 ARROW trial. Nat Med 28 (8): 1640-1645, 2022.35962206
Le DT, Uram JN, Wang H, et al.: PD-1 Blockade in Tumors with Mismatch-Repair Deficiency. N Engl J Med 372 (26): 2509-20, 2015.26028255
Overman MJ, McDermott R, Leach JL, et al.: Nivolumab in patients with metastatic DNA mismatch repair-deficient or microsatellite instability-high colorectal cancer (CheckMate 142): an open-label, multicentre, phase 2 study. Lancet Oncol 18 (9): 1182-1191, 2017.28734759
Luchini C, Bibeau F, Ligtenberg MJL, et al.: ESMO recommendations on microsatellite instability testing for immunotherapy in cancer, and its relationship with PD-1/PD-L1 expression and tumour mutational burden: a systematic review-based approach. Ann Oncol 30 (8): 1232-1243, 2019.31056702
Marcus L, Lemery SJ, Keegan P, et al.: FDA Approval Summary: Pembrolizumab for the Treatment of Microsatellite Instability-High Solid Tumors. Clin Cancer Res 25 (13): 3753-3758, 2019.30787022
Tanizaki J, Yonemori K, Akiyoshi K, et al.: Open-label phase II study of the efficacy of nivolumab for cancer of unknown primary. Ann Oncol 33 (2): 216-226, 2022.34843940
Fizazi K, Maillard A, Penel N: A phase III trial of empiric chemotherapy with cisplatin and gemcitabine or systemic treatment tailored by molecular gene expression analysis in patients with carcinomas of an unknown primary (CUP) site (GEFCAPI 04). [Abstract] Ann Oncol 30 (Suppl 5): A-LBA15_PR, v851, 2019.
Hayashi H, Kurata T, Takiguchi Y, et al.: Randomized Phase II Trial Comparing Site-Specific Treatment Based on Gene Expression Profiling With Carboplatin and Paclitaxel for Patients With Cancer of Unknown Primary Site. J Clin Oncol 37 (7): 570-579, 2019.30653423
Ding Y, Jiang J, Xu J, et al.: Site-specific therapy in cancers of unknown primary site: a systematic review and meta-analysis. ESMO Open 7 (2): 100407, 2022.35248824
Kato S, Gumas S, Adashek JJ, et al.: Multi-omic analysis in carcinoma of unknown primary (CUP): therapeutic impact of knowing the unknown. Mol Oncol 18 (4): 956-968, 2024.35866362

## Stage Information for Cancer of Unknown Primary

A positron emission tomography–computed tomography (PET-CT) scan of the whole body can reveal the extent of disease and is especially useful in single-site or oligometastatic presentations, especially for patients with cervical lymph node metastases suspicious for a head and neck primary.[1-4]

PET-CT can be combined with somatostatin receptor PET-CT scans for neuroendocrine neoplasms or prostate-specific membrane antigen for suspected prostate cancer. A meta-analysis of 20 studies including 1,942 patients found a biopsy confirmed or clinically confirmed positive PET-CT scan in 40.9% of patients (95% confidence interval [CI], 40.0%–42.9%).[5]

A meta-analysis of 38 studies including 2,795 patients found that a fluorine F 18-fludeoxyglucose–PET or PET-CT scan led to management changes in 35% of patients (95% CI, 31%–40%).[6] In this meta-analysis, PET-CT identified a primary site in 22% of patients (95% CI, 18%–28%) and other metastases in 14% of patients (95% CI, 10%–19%).[6]

After staging with a PET-CT scan and magnetic resonance imaging of the head, the next step is molecular characterization and next-generation sequencing, preferably on the tissue biopsy or alternatively by analyzing circulating tumor cells on a blood sample (so-called liquid biopsy).

### References

Lievens Y, Guckenberger M, Gomez D, et al.: Defining oligometastatic disease from a radiation oncology perspective: An ESTRO-ASTRO consensus document. Radiother Oncol 148: 157-166, 2020.32388150
Albertson M, Chandra S, Sayed Z, et al.: PET/CT Evaluation of Head and Neck Cancer of Unknown Primary. Semin Ultrasound CT MR 40 (5): 414-423, 2019.31635768
de Braud F, al-Sarraf M: Diagnosis and management of squamous cell carcinoma of unknown primary tumor site of the neck. Semin Oncol 20 (3): 273-8, 1993.8503023 93276305
Smith KA, Dort JC, Hall SF, et al.: Cost-effectiveness of positron emission tomography-CT in the evaluation of cancer of unknown primary of the head and neck. Head Neck 37 (12): 1781-7, 2015.24989937
Burglin SA, Hess S, Høilund-Carlsen PF, et al.: 18F-FDG PET/CT for detection of the primary tumor in adults with extracervical metastases from cancer of unknown primary: A systematic review and meta-analysis. Medicine (Baltimore) 96 (16): e6713, 2017.28422888
Woo S, Becker AS, Do RKG, et al.: Impact of 18F-Fluorodeoxyglucose positron emission tomography on management of cancer of unknown primary: systematic review and meta-analysis. Eur J Cancer 159: 60-77, 2021.34742159

## Treatment of Newly Diagnosed Favorable Cancer of Unknown Primary

Twenty percent of patients with cancer of unknown primary (CUP) have favorable CUP. Favorable CUP is defined by the following characteristics:

- Single-site or oligometastatic disease amenable to surgery or radiation therapy.
- Cervical lymph node(s) with squamous cell histology (head and neck paradigm).
- Inguinal lymph nodes with squamous cell histology (genitourinary or anorectal source).
- Axillary lymph node(s) with adenocarcinoma histology (breast paradigm).
- Bone metastases if blastic (breast paradigm for women, prostate paradigm for men).
- Elevated alpha-fetoprotein (AFP) and/or beta-human chorionic gonadotropin (beta-hCG) (germ cell paradigm).
- Peritoneal carcinomatosis if adenocarcinoma (ovarian paradigm).
- Targeted therapy defined by molecular markers or by next-generation sequencing (including PD-L1, homologous recombination repair deficiency [HRD], microsatellite instability [MSI]).
- Neuroendocrine neoplasms.
- Melanoma (melanotic or amelanotic) occurring in a single lymph node site.

### Single-Site or Oligometastatic Disease Amenable to Surgery or Radiation Therapy

According to a consensus paper, when a single site of metastasis can be confirmed by positron emission tomography–computed tomography (PET-CT) scan and magnetic resonance imaging (MRI) of the brain, local treatment with surgery or radiation therapy is an option. Local treatment has resulted in anecdotal cure in a few patients and several months to years of anecdotal relapse-free survival in a few patients.[1][Level of evidence C3] Anecdotal reports also support localized therapy for patients with fewer than five metastases, or even re-treatment with radiation therapy or surgery for patients with localized recurrence.[2][Level of evidence C3] A patient staged with CUP and a single brain metastasis may also do well with radiation therapy with or without surgery, as was reported in a prospective study of 33 patients.[3,4][Level of evidence C3]

### Cervical Lymph Node(s) With Squamous Cell Histology (Head and Neck Paradigm)

PET-CT, MRI, and pan-endoscopy for biopsies and bilateral tonsillectomies are performed when squamous cell carcinoma is identified in cervical lymph nodes (not supraclavicular) in patients with CUP.[5]

Transoral robotic surgery may replace pan-endoscopy in the search for a primary site in the head and neck region.[6] Pathological studies should include testing for p16 expression to assess human papillomavirus status, Epstein-Barr virus status, and PD-L1 expression.[7]

For more information, see Metastatic Squamous Neck Cancer with Occult Primary Treatment.

### Inguinal Lymph Nodes With Squamous Cell Histology (Genitourinary or Anorectal Source)

Squamous cell carcinoma in an inguinal or iliac site is usually associated with a genital or anorectal primary. Examinations should focus on the vulva, vagina, and cervix in women, and the penis in men. In both sexes, the anorectal area should be examined, and any suspicious areas should be biopsied. Anecdotal cures have been reported in a few cases of isolated inguinal or iliac sites with an occult primary after staging studies.[8]

### Axillary Lymph Node(s) With Adenocarcinoma Histology (Breast Paradigm)

Less than 1% of female patients present with histological breast cancer in an axillary lymph node with an occult primary even after MRI of the breast.[9] Initial pathological studies should include estrogen-receptor, progesterone-receptor, and human epidermal growth factor (HER2) status, with further molecular and genetic studies done subsequently. Surgery, radiation therapy, neoadjuvant or adjuvant chemotherapy, and/or hormonal therapy are given according to guidelines for conventional breast cancer.[10-13]

For more information, see Breast Cancer Treatment.

### Bone Metastases if Blastic (Breast Paradigm for Women, Prostate Paradigm for Men)

The presence of blastic bone metastases or mixed blastic/lytic lesions will usually suggest breast cancer in women and prostate cancer in men. Diagnostic procedures and therapeutic options should proceed in these directions.

For more information, see Breast Cancer Treatment or Prostate Cancer Treatment.

### Elevated AFP and/or Beta-hCG (Germ Cell Paradigm)

The presence of elevated serum or tissue levels of AFP and/or beta-hCG suggests testicular cancer or extragonadal germ cell tumor in males. Men younger than 50 years with mediastinal adenopathy and pulmonary metastases have immunohistochemical evidence of AFP and/or beta-hCG in the extragonadal presentation. Diagnostic procedures and therapeutic options should proceed in these directions.

For more information, see Testicular Cancer Treatment and Extragonadal Germ Cell Tumors Treatment.

### Peritoneal Carcinomatosis if Adenocarcinoma (Ovarian Paradigm)

Women with peritoneal carcinomatosis of an undifferentiated adenocarcinoma or serous histology in the absence of an ovarian, fallopian tube, or uterine primary site should undergo diagnostic testing and a therapeutic approach for ovarian cancer.[14] This is considered a primary peritoneal serous carcinoma.

For more information, see Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancer Treatment.

### Targeted Therapy Defined by Molecular Markers or by Next-Generation Sequencing (Including PD-L1, HRD, MSI)

Clinical, pathological, and molecular genetic tests have two goals. The first is to identify tumors that are responsive to available therapies. The second is to identify novel targeted therapies that might be applicable to the particular genetic profile. The U.S. Food and Drug Administration has approved some novel targeted therapies when a molecular target is identified in a cancer, regardless of primary site or when no primary site is evident. Examples include tumors with the following actionable targets:.[15-22]

- High tumor mutational burden.
- Elevated PD-1 or PD-L1 expression.
- HER2 expression.
- Pathogenic variants in NTRK, RET, or EGFR.
- BRAF V600E pathogenic variant.
- ROS1 gene fusion.
- MET amplification.
- HRD/MSI.

### Neuroendocrine Neoplasms

Neuroendocrine neoplasms are classified as well-differentiated neuroendocrine tumors (NETs) and slow progression neuroendocrine carcinomas (NEC). Well-differentiated NETs exhibit relatively indolent behavior. Slow progression NECs may exhibit highly aggressive behavior, with a rapid metastatic spread that is clinically indistinguishable from pancreatic adenocarcinoma or small cell lung cancer. The Ki-67 proliferative index rate is used to subclassify well-differentiated NETs into low, intermediate, and high-grade, while NECs are by default high-grade and poorly differentiated and divided into small- and large-cell NEC.

NETs of unknown primary origin may derive from the small bowel, pancreas, appendix, colon, rectum, or ovary.[23,24] Somatostatin receptor PET-CT scans are highly effective at identifying primary sites and metastatic sites for well-differentiated NETs, while fluorine F 18-fludeoxyglucose–PET is more appropriate for NEC.[25-27]

For more information, see Gastrointestinal Neuroendocrine Tumors Treatment.

Merkel cell carcinoma is a rare, aggressive, cutaneous malignancy of neuroendocrine origin, usually with primary lesions in the head and neck or in the extremities. However, it may present in the lymph nodes only, with no evident primary site.[28]

For more information, see Merkel Cell Carcinoma Treatment.

### Melanoma (Melanotic or Amelanotic) Occurring in a Single Lymph Node Site

Approximately 5% of patients with malignant melanoma will present without a documented primary site. Diagnostic studies and therapeutic options should proceed with the paradigm of malignant melanoma.[29]

For more information, see Melanoma Treatment.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Lievens Y, Guckenberger M, Gomez D, et al.: Defining oligometastatic disease from a radiation oncology perspective: An ESTRO-ASTRO consensus document. Radiother Oncol 148: 157-166, 2020.32388150
Pouyiourou M, Wohlfromm T, Kraft B, et al.: Local ablative treatment with surgery and/or radiotherapy in single-site and oligometastatic carcinoma of unknown primary. Eur J Cancer 157: 179-189, 2021.34521064
Bartelt S, Lutterbach J: Brain metastases in patients with cancer of unknown primary. J Neurooncol 64 (3): 249-53, 2003.14558600
Rudà R, Borgognone M, Benech F, et al.: Brain metastases from unknown primary tumour: a prospective study. J Neurol 248 (5): 394-8, 2001.11437161
de Braud F, al-Sarraf M: Diagnosis and management of squamous cell carcinoma of unknown primary tumor site of the neck. Semin Oncol 20 (3): 273-8, 1993.8503023 93276305
Al-Lami A, Gao C, Saddiq M, et al.: Reducing the unknowns: A systematic review & meta-analysis of the effectiveness of trans-oral surgical techniques in identifying head and neck primary cancer in carcinoma unknown primary. Oral Oncol 126: 105748, 2022.35144209
Machiels JP, René Leemans C, Golusinski W, et al.: Squamous cell carcinoma of the oral cavity, larynx, oropharynx and hypopharynx: EHNS-ESMO-ESTRO Clinical Practice Guidelines for diagnosis, treatment and follow-up. Ann Oncol 31 (11): 1462-1475, 2020.33239190
Matsuyama S, Nakafusa Y, Tanaka M, et al.: Iliac lymph node metastasis of an unknown primary tumor: report of a case. Surg Today 36 (7): 655-8, 2006.16794805
de Bresser J, de Vos B, van der Ent F, et al.: Breast MRI in clinically and mammographically occult breast cancer presenting with an axillary metastasis: a systematic review. Eur J Surg Oncol 36 (2): 114-9, 2010.19822403
Kim H, Park W, Kim SS, et al.: Prognosis of patients with axillary lymph node metastases from occult breast cancer: analysis of multicenter data. Radiat Oncol J 39 (2): 107-112, 2021.34619827
McCartan DP, Zabor EC, Morrow M, et al.: Oncologic Outcomes After Treatment for MRI Occult Breast Cancer (pT0N+). Ann Surg Oncol 24 (11): 3141-3147, 2017.28702770
Van den Bruele AB, Chen I, Sevilimedu V, et al.: Management of ipsilateral breast tumor recurrence following breast conservation surgery: a comparative study of re-conservation vs mastectomy. Breast Cancer Res Treat 187 (1): 105-112, 2021.33433775
Thompson JL, Sinco BR, McCaffrey RL, et al.: Prophylactic mastectomy and occult malignancy: Surgical and imaging considerations. J Surg Oncol 127 (1): 18-27, 2023.36069388
Pentheroudakis G, Pavlidis N: Serous papillary peritoneal carcinoma: unknown primary tumour, ovarian cancer counterpart or a distinct entity? A systematic review. Crit Rev Oncol Hematol 75 (1): 27-42, 2010.19897383
Adashek JJ, Menta AK, Reddy NK, et al.: Tissue-Agnostic Activity of BRAF plus MEK Inhibitor in BRAF V600-Mutant Tumors. Mol Cancer Ther 21 (6): 871-878, 2022.35413124
Subbiah V, Wolf J, Konda B, et al.: Tumour-agnostic efficacy and safety of selpercatinib in patients with RET fusion-positive solid tumours other than lung or thyroid tumours (LIBRETTO-001): a phase 1/2, open-label, basket trial. Lancet Oncol 23 (10): 1261-1273, 2022.36108661
Subbiah V, Cassier PA, Siena S, et al.: Pan-cancer efficacy of pralsetinib in patients with RET fusion-positive solid tumors from the phase 1/2 ARROW trial. Nat Med 28 (8): 1640-1645, 2022.35962206
Le DT, Uram JN, Wang H, et al.: PD-1 Blockade in Tumors with Mismatch-Repair Deficiency. N Engl J Med 372 (26): 2509-20, 2015.26028255
Overman MJ, McDermott R, Leach JL, et al.: Nivolumab in patients with metastatic DNA mismatch repair-deficient or microsatellite instability-high colorectal cancer (CheckMate 142): an open-label, multicentre, phase 2 study. Lancet Oncol 18 (9): 1182-1191, 2017.28734759
Luchini C, Bibeau F, Ligtenberg MJL, et al.: ESMO recommendations on microsatellite instability testing for immunotherapy in cancer, and its relationship with PD-1/PD-L1 expression and tumour mutational burden: a systematic review-based approach. Ann Oncol 30 (8): 1232-1243, 2019.31056702
Marcus L, Lemery SJ, Keegan P, et al.: FDA Approval Summary: Pembrolizumab for the Treatment of Microsatellite Instability-High Solid Tumors. Clin Cancer Res 25 (13): 3753-3758, 2019.30787022
Tanizaki J, Yonemori K, Akiyoshi K, et al.: Open-label phase II study of the efficacy of nivolumab for cancer of unknown primary. Ann Oncol 33 (2): 216-226, 2022.34843940
Kotteas EA, Pavlidis N: Neuroendocrine Merkel cell nodal carcinoma of unknown primary site: management and outcomes of a rare entity. Crit Rev Oncol Hematol 94 (1): 116-21, 2015.25573607
Begum N, Wellner U, Thorns C, et al.: CUP Syndrome in Neuroendocrine Neoplasia: Analysis of Risk Factors and Impact of Surgical Intervention. World J Surg 39 (6): 1443-51, 2015.25665670
Ma H, Kan Y, Yang JG: Clinical value of 68Ga-DOTA-SSTR PET/CT in the diagnosis and detection of neuroendocrine tumors of unknown primary origin: a systematic review and meta-analysis. Acta Radiol 62 (9): 1217-1228, 2021.32985224
Menda Y, O'Dorisio TM, Howe JR, et al.: Localization of Unknown Primary Site with 68Ga-DOTATOC PET/CT in Patients with Metastatic Neuroendocrine Tumor. J Nucl Med 58 (7): 1054-1057, 2017.28153957
De Dosso S, Treglia G, Pascale M, et al.: Detection rate of unknown primary tumour by using somatostatin receptor PET/CT in patients with metastatic neuroendocrine tumours: a meta-analysis. Endocrine 64 (3): 456-468, 2019.31004334
Broida SE, Chen XT, Baum CL, et al.: Merkel cell carcinoma of unknown primary: Clinical presentation and outcomes. J Surg Oncol 126 (6): 1080-1086, 2022.35809230
De Andrade JP, Wong P, O'Leary MP, et al.: Multidisciplinary Care for Melanoma of Unknown Primary: Experience in the Era of Molecular Profiling. Ann Surg Oncol 27 (13): 5240-5247, 2020.32909128

## Treatment of Newly Diagnosed Unfavorable Cancer of Unknown Primary

Most patients with newly diagnosed cancer of unknown primary (CUP) are considered to have an unfavorable prognosis.

### Treatment Options for Newly Diagnosed Unfavorable CUP

Treatment options for newly diagnosed unfavorable CUP include the following:

- Site-directed therapy based on molecular tissue of origin/molecular targeted therapy.
- Immunological therapy.
- Chemotherapy.

#### Site-directed therapy based on molecular tissue of origin or molecular targeted therapy

Clinical, pathological, and molecular genetic tests have two goals. The first is to identify tumors that are responsive to available therapies. The second is to identify novel targeted therapies that might be applicable to the particular genetic profile. The U.S. Food and Drug Administration (FDA) has approved some novel targeted therapies when a molecular target is identified in a cancer, regardless of primary site or when no primary site is evident. Examples include tumors with the following actionable targets:[1-8]

- High tumor mutational burden (TMB-H).
- Elevated PD-1 or PD-L1 expression.
- HER2 expression.
- Pathogenic variants in NTRK, RET, or EGFR.
- BRAF V600E pathogenic variant.
- ROS1 gene fusion.
- MET amplification.
- Homologous recombination repair deficiency/microsatellite instability (MSI).

#### Immunological therapy

Immunological therapy using checkpoint inhibitors such as nivolumab has been given to a general population with unfavorable CUP, resulting in a 22% overall response rate.[8] Better response rates can be seen when checkpoint inhibitors are given to patients with tumors expressing high levels of MSI (MSI-H) or deficient mismatch repair (dMMR).[7] Patients with TMB-H disease, defined as at least 7.75 mutations [8] or 10 mutations [9] per megabase, also have higher response rates to immunotherapy.[6] The FDA has approved pembrolizumab in a tumor-agnostic situation (which includes CUP) for tumors with MSI-H, dMMR, or TMB-H.[7] High PD-L1 expression also correlates with higher response rates in patients who receive immunotherapy.[8] Further trials for patients with CUP are required to assess when to give checkpoint inhibitors and to define optimal cutoffs (1% to 50%) and scoring systems (cancer cell tumor proportion score vs. cancer-plus-surrounding cell combined positive score) to guide treatment.[10]

#### Chemotherapy

Patients with unfavorable CUP who are not candidates for molecular targeted therapy or immunotherapy are candidates for clinical trials. Cytotoxic chemotherapy can be a palliative therapy, but the choice of drugs has been based on a few small clinical studies, with no randomized trials establishing their benefit over best supportive care.[10] Several randomized prospective studies demonstrate that platinum-based doublet chemotherapy combined with a taxane or gemcitabine is equivalent to other chemotherapy in response rate and progression-free survival.[11-14][Level of evidence B1] Although most patients in these trials had adenocarcinoma or poorly differentiated carcinoma, patients with poorly differentiated squamous cell carcinoma were included.

Palliative care and hospice are options for patients with a poor performance status and relapsing disease.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Adashek JJ, Menta AK, Reddy NK, et al.: Tissue-Agnostic Activity of BRAF plus MEK Inhibitor in BRAF V600-Mutant Tumors. Mol Cancer Ther 21 (6): 871-878, 2022.35413124
Subbiah V, Wolf J, Konda B, et al.: Tumour-agnostic efficacy and safety of selpercatinib in patients with RET fusion-positive solid tumours other than lung or thyroid tumours (LIBRETTO-001): a phase 1/2, open-label, basket trial. Lancet Oncol 23 (10): 1261-1273, 2022.36108661
Subbiah V, Cassier PA, Siena S, et al.: Pan-cancer efficacy of pralsetinib in patients with RET fusion-positive solid tumors from the phase 1/2 ARROW trial. Nat Med 28 (8): 1640-1645, 2022.35962206
Le DT, Uram JN, Wang H, et al.: PD-1 Blockade in Tumors with Mismatch-Repair Deficiency. N Engl J Med 372 (26): 2509-20, 2015.26028255
Overman MJ, McDermott R, Leach JL, et al.: Nivolumab in patients with metastatic DNA mismatch repair-deficient or microsatellite instability-high colorectal cancer (CheckMate 142): an open-label, multicentre, phase 2 study. Lancet Oncol 18 (9): 1182-1191, 2017.28734759
Luchini C, Bibeau F, Ligtenberg MJL, et al.: ESMO recommendations on microsatellite instability testing for immunotherapy in cancer, and its relationship with PD-1/PD-L1 expression and tumour mutational burden: a systematic review-based approach. Ann Oncol 30 (8): 1232-1243, 2019.31056702
Marcus L, Lemery SJ, Keegan P, et al.: FDA Approval Summary: Pembrolizumab for the Treatment of Microsatellite Instability-High Solid Tumors. Clin Cancer Res 25 (13): 3753-3758, 2019.30787022
Tanizaki J, Yonemori K, Akiyoshi K, et al.: Open-label phase II study of the efficacy of nivolumab for cancer of unknown primary. Ann Oncol 33 (2): 216-226, 2022.34843940
Hellmann MD, Ciuleanu TE, Pluzanski A, et al.: Nivolumab plus Ipilimumab in Lung Cancer with a High Tumor Mutational Burden. N Engl J Med 378 (22): 2093-2104, 2018.29658845
Krämer A, Bochtler T, Pauli C, et al.: Cancer of unknown primary: ESMO Clinical Practice Guideline for diagnosis, treatment and follow-up. Ann Oncol 34 (3): 228-246, 2023.36563965
Huebner G, Link H, Kohne CH, et al.: Paclitaxel and carboplatin vs gemcitabine and vinorelbine in patients with adeno- or undifferentiated carcinoma of unknown primary: a randomised prospective phase II trial. Br J Cancer 100 (1): 44-9, 2009.19066607
Gross-Goupil M, Fourcade A, Blot E, et al.: Cisplatin alone or combined with gemcitabine in carcinomas of unknown primary: results of the randomised GEFCAPI 02 trial. Eur J Cancer 48 (5): 721-7, 2012.22317952
Lee J, Hahn S, Kim DW, et al.: Evaluation of survival benefits by platinums and taxanes for an unfavourable subset of carcinoma of unknown primary: a systematic review and meta-analysis. Br J Cancer 108 (1): 39-48, 2013.23175147
Hainsworth JD, Spigel DR, Clark BL, et al.: Paclitaxel/carboplatin/etoposide versus gemcitabine/irinotecan in the first-line treatment of patients with carcinoma of unknown primary site: a randomized, phase III Sarah Cannon Oncology Research Consortium Trial. Cancer J 16 (1): 70-5, 2010.20164695

## Follow-Up Treatment of Cancer of Unknown Primary in Remission

The use of follow-up studies including computed tomography or magnetic resonance imaging, is extrapolated from paradigms of other related malignancies with known primary sites. No prospective trials evaluating clinical surveillance have been conducted for patients with cancer of unknown primary.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Latest Updates to This Summary (05/07/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of cancer of unknown primary. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Cancer of Unknown Primary (CUP) Treatment are:

- Jacob Adashek, DO (Consultant)
- Eric J. Seifter, MD (Johns Hopkins University)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Cancer of Unknown Primary (CUP) Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/unknown-primary/hp/unknown-primary-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389252]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).